# Pediatric Chimeric Antigen Receptor (CAR) T-Cell Therapy (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of CAR T-cell therapy in treating pediatric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Chimeric Antigen Receptor (CAR) T-Cell Therapy for Pediatric Cancer

T cells attack cellular targets (viruses or cancer cells) by binding to class I major histocompatibility complex (MHC) molecules on the surface of the target cells. T cells also have to avoid suppressor signals sent by regulatory T cells and other surface molecule interactions. Gene transfer technologies can modify T cells to express MHC-independent, antibody-binding domains (CAR molecules) on the surface of the modified T cells. The CAR molecules aim at specific target proteins on the surface of tumors. Lymphodepleting chemotherapy is generally given before CAR T-cell infusions to minimize the chance of suppressor mechanisms (affecting CAR T-cell function) and to create a cytokine milieu favorable for CAR T-cell expansion.[1] CAR T-cell–mediated responses are further enhanced by adding intracellular costimulatory domains (e.g., CD28, 4-1BB), which cause significant CAR T-cell expansion and may increase the lifespan of these cells in the recipient.[1]

### CAR T-Cell Therapy Indications for Pediatric Cancer

Investigators using this technology have targeted a variety of tumors/surface molecules, but the best-studied example in pediatric patients is CAR T cells aimed at CD19, a surface receptor on B cells. Several research groups have reported significant rates of remission (70%–90%) in children and adults with refractory B-cell acute lymphoblastic leukemia (ALL),[2-5] with some groups reporting persistence of CAR T cells and remission beyond 6 months in most patients studied.[5,6] Early loss of the CAR T cells is associated with relapse, and the best use of this therapy (bridge to transplant vs. definitive therapy) is under study.

Indications for hematopoietic stem cell transplant vary over time as risk classifications for a given malignancy change and the efficacy of primary therapy improves. It is best to include specific indications in the context of complete therapy for any given disease. With this in mind, links to sections in specific summaries that cover the most common pediatric CAR T-cell therapy indications are provided below.

1. B-cell acute lymphoblastic leukemia.
  - For more information, see the Treatment of Relapsed Childhood ALL section in Childhood Acute Lymphoblastic Leukemia Treatment.
2. B-cell non-Hodgkin lymphoma.
  - For more information, see the Treatment options for recurrent or refractory Burkitt lymphoma section in Childhood Non-Hodgkin Lymphoma Treatment.

### CAR T-Cell Toxicities

#### Cytokine release syndrome (CRS)

Responses to CAR T-cell therapies have been associated with a significant increase in inflammatory cytokines, termed cytokine release syndrome (CRS). CRS can be successfully treated with anti–interleukin-6 receptor (IL-6R) therapies (e.g., tocilizumab), often in combination with steroids.[7,8] CRS presents as a sepsis-like situation, with fever, headache, myalgias, hypotension, capillary leak, hypoxia, and renal dysfunction. The severity of the CRS determines whether patients require therapy. The progression of CRS can be measured by staging. The American Society for Transplantation and Cellular Therapy Consensus guidelines for CRS have been broadly adopted (see Table 1).[9] While treatment of grade 1 and early grade 2 CRS is generally not offered, patients with some forms of grade 2 and all patients with grades 3 and 4 CRS receive therapy.[10]

Table 1. ASTCT CRS Consensus Grading^a,b^

CRS Parameter | Grade 1 | Grade 2 | Grade 3 | Grade 4
Fever ^c^ | Temperature ≥38°C | Temperature ≥38°C | Temperature ≥38°C | Temperature ≥38°C
With
Hypotension | None | Not requiring vasopressors | Requiring a vasopressor with or without vasopressin | Requiring multiple vasopressors (excluding vasopressin)
And/or ^d^
Hypoxia | None | Requiring low-flow nasal cannula^e^ or blow-by | Requiring high-flow nasal cannula^e^, facemask, nonrebreather mask, or Venturi mask | Requiring positive pressure (e.g., CPAP, BiPAP, intubation and mechanical ventilation)

ASTCT = American Society for Transplantation and Cellular Therapy; BiPAP = bilevel positive airway pressure; CPAP = continuous positive airway pressure; CRS = cytokine release syndrome; CTCAE = Common Terminology Criteria for Adverse Events.

^a^Reprinted from Biology of Blood and Marrow Transplantation (https://www.sciencedirect.com/journal/biology-of-blood-and-marrow-transplantation), Volume 25, Issue 4, Daniel W. Lee, Bianca D. Santomasso, Frederick L. Locke et al., ASTCT Consensus Grading for Cytokine Release Syndrome and Neurologic Toxicity Associated with Immune Effector Cells, Pages 625–638, Copyright 2019, with permission from Elsevier.[9]

^b^Organ toxicities associated with CRS may be graded according to CTCAE v5.0 but they do not influence CRS grading.

^c^Fever is defined as temperature ≥38°C not attributable to any other cause. In patients who have CRS then receive antipyretic or anticytokine therapy such as tocilizumab or steroids, fever is no longer required to grade subsequent CRS severity. In this case, CRS grading is driven by hypotension and/or hypoxia.

^d^CRS grade is determined by the more severe event: hypotension or hypoxia not attributable to any other cause. For example, a patient with temperature of 39.5°C, hypotension requiring 1 vasopressor, and hypoxia requiring low-flow nasal cannula is classified as grade 3 CRS.

^e^Low-flow nasal cannula is defined as oxygen delivered at ≤6L/minute. Low flow also includes blow-by oxygen delivery, sometimes used in pediatrics. High-flow nasal cannula is defined as oxygen delivered at >6L/minute.

##### Approaches to mitigating CRS toxicities

Early studies of CD19-targeted CAR T cells using both CD28 and 4-1BB costimulatory domains varied in approach. The use of tocilizumab or steroids was limited to patients who experienced severe toxicities because of concern about the loss of CAR T-cell persistence (with excessive use of immune suppressive agents). These toxicities included hypotension requiring high-dose vasopressors, severe hypoxia, or intubation. After one early study showed similar efficacy in patients treated with and without tocilizumab,[11] investigators designed approaches aimed at early treatment of CRS to limit organ damage secondary to grade 4 CRS. Some approaches have decreased toxicity without obvious effects on efficacy.

Evidence (early interventions for CRS):

1. Investigators at Seattle Children’s Hospital compared a strategy of early intervention versus standard practice. Early intervention included treatment with tocilizumab for patients with a fever higher than 39°C that was unresponsive to acetaminophen, persistent hypotension after a 10 mL/kg bolus, or initiation of oxygen. Steroids were given after tocilizumab if symptoms persisted or worsened 6 to 12 hours later.[12]
  - The early intervention approach doubled the number of patients requiring tocilizumab or steroids but did not affect the overall minimal residual disease–negative remission rate, infection rate, long-term persistence of CAR T cells, or overall survival (OS).
  - In addition, early intervention for patients with CRS resulted in a decreased need for intubation or inotropic support, from 30% to 15%. However, this finding was not statistically significant (P = .29), possibly because of the small number of patients.
2. Investigators at Children's Hospital of Philadelphia performed a prospective trial of a different strategy of early intervention. Because of earlier findings that showed that high disease burden at the time of CAR T-cell treatment was associated with severe CRS,[6] they defined a high–tumor burden cohort as patients with 40% or more marrow blasts before infusion. Planned early intervention for this cohort was tocilizumab, given for two fevers of 38.5°C or higher, at least 4 hours apart, in a 24-hour period.[13]
  - Grade 4 CRS decreased from 50% (in a comparator cohort) to 27% in the high–tumor burden cohort (P = .18), with no change in efficacy and long-term CAR T-cell persistence.

#### Immune effector cell–associated neurotoxicity syndrome (ICANS)

Neurological toxicities, including aphasia, altered mental status, and seizures, have also been observed with CAR T-cell therapy. This clinical syndrome (ICANS) is graded according to the most severe event of the following five measures that are not attributable to any other cause:[9]

1. Standardized neurological responsiveness score (tests vary by age: Immune Effector Cell-Associated Encephalopathy [ICE] score for children aged ≥12 years and Cornell Assessment of Pediatric Delirium [CAPD] for children aged <12 years).
2. Level of consciousness.
3. Seizure activity.
4. Motor weakness.
5. Elevated intracranial pressure/cerebral edema.

Most neurological toxicities after CD19-targeted CAR T-cell therapy have been short lived (1–5 days). However, rare, fatal events such as severe cerebral edema have been reported.[14] The pathophysiology of central nervous system (CNS) toxicity is likely related to disruption of the blood-brain barrier secondary to systemic cytokine release,[14] high levels of cytokines in the cerebrospinal fluid,[14] and/or direct attack of CD19-positive brain mural cells in the CNS tissue by the CAR T cells.[15] CNS symptoms have not responded well to IL-6R–targeting agents and have generally been treated with high-dose steroids or other approaches. The exact timing of required treatment for ICANS is controversial, but concerns about its rare, fatal form have led to near-uniform recommendations for the treatment of patients with grade 3 or higher ICANS.[16]

#### Hemophagocytic lymphohistiocytosis (HLH)–like toxicities

A portion of patients undergoing CAR T-cell therapy will have HLH-like toxicities associated with CRS (hyperferritinemia with organ dysfunction). Severity of symptoms and outcomes vary by CAR construct. It is not known whether early or preventive treatment can improve patient outcomes.

Evidence (effect of HLH-like toxicities on patient outcomes):

1. Investigators at the National Cancer Institute noted increased HLH-like toxicities in a trial of CD22-targeted CAR T-cell therapy.[17]
  - HLH-like toxicity was seen in 19 of 58 patients (32.8%). The average time to onset of HLH-like toxicity was 14 days after CAR T-cell therapy. CRS had resolved or was resolving before the onset of HLH-like features.
  - CD4/CD8 T-cell selection of the apheresis product improved CAR T-cell manufacturing feasibility. However, after this modification, patients experienced heightened HLH-like toxicities, which led to dose de-escalation.
  - HLH-like toxicity did not alter survival outcomes but often required intense interventions such as anakinra.
2. Investigators from the Pediatric Real World CAR Consortium analyzed 183 evaluable children and adolescent and young adult patients treated with tisagenlecleucel for B-cell ALL and found that 14% had HLH-like toxicities.[18]
  - HLH-like toxicity was associated with poor OS (hazard ratio [HR], 4.61; 95% confidence interval [CI], 2.41–8.83) and relapse-free survival (RFS) (HR, 3.68; 95% CI, 2.15–6.32). The 1-year RFS and OS rates were 25.7% and 4.7%, respectively, for patients with HLH-like toxicities, compared with 80.1% and 57.6%, respectively, for patients without HLH-like toxicities.
  - Patients who developed HLH-like toxicity had higher pre-infusion disease burden, ferritin levels, and C-reactive protein levels, compared with patients who did not develop HLH-like toxicity. Patients who developed HLH-like toxicity also had lower pre-infusion platelet and absolute neutrophil counts.
  - Patients who developed HLH-like toxicity subsequently had higher rates of infection, relapse, and nonrelapse mortality.

#### Other side effects of CAR T-cell therapy

Other CAR T-cell therapy side effects include the following:

- Coagulopathy.
- Cardiac dysfunction.

Early studies of patients with high levels of disease and delayed CRS therapy resulted in 20% to 40% of patients requiring treatment in the intensive care unit (ICU) (mostly vasopressor support, with 10% to 20% of patients requiring intubation and/or dialysis).[2,5,6] However, current real-world data show that ICU requirements are now approximately 10% to 20%.[19]

### Approved CAR T-Cell Therapies

An international trial in children led to U.S. Food and Drug Administration approval of tisagenlecleucel for patients aged 1 to 25 years with CD19-positive B-cell ALL that is refractory or in second or later relapse.[20]

Tisagenlecleucel has also been approved for adults with relapsed or refractory B-cell lymphoma, as has axicabtagene ciloleucel, brexucabtagene autoleucel, and lisocabtagene maraleucel.[21,22]

### References

Kalos M, Levine BL, Porter DL, et al.: T cells with chimeric antigen receptors have potent antitumor effects and can establish memory in patients with advanced leukemia. Sci Transl Med 3 (95): 95ra73, 2011.21832238
Grupp SA, Kalos M, Barrett D, et al.: Chimeric antigen receptor-modified T cells for acute lymphoid leukemia. N Engl J Med 368 (16): 1509-18, 2013.23527958
Lee DW, Kochenderfer JN, Stetler-Stevenson M, et al.: T cells expressing CD19 chimeric antigen receptors for acute lymphoblastic leukaemia in children and young adults: a phase 1 dose-escalation trial. Lancet 385 (9967): 517-28, 2015.25319501
Davila ML, Riviere I, Wang X, et al.: Efficacy and toxicity management of 19-28z CAR T cell therapy in B cell acute lymphoblastic leukemia. Sci Transl Med 6 (224): 224ra25, 2014.24553386
Gardner RA, Finney O, Annesley C, et al.: Intent-to-treat leukemia remission by CD19 CAR T cells of defined formulation and dose in children and young adults. Blood 129 (25): 3322-3331, 2017.28408462
Maude SL, Frey N, Shaw PA, et al.: Chimeric antigen receptor T cells for sustained remissions in leukemia. N Engl J Med 371 (16): 1507-17, 2014.25317870
Lee DW, Gardner R, Porter DL, et al.: Current concepts in the diagnosis and management of cytokine release syndrome. Blood 124 (2): 188-95, 2014.24876563
Maude SL, Barrett D, Teachey DT, et al.: Managing cytokine release syndrome associated with novel T cell-engaging therapies. Cancer J 20 (2): 119-22, 2014 Mar-Apr.24667956
Lee DW, Santomasso BD, Locke FL, et al.: ASTCT Consensus Grading for Cytokine Release Syndrome and Neurologic Toxicity Associated with Immune Effector Cells. Biol Blood Marrow Transplant 25 (4): 625-638, 2019.30592986
McNerney KO, Hsieh EM, Shalabi H, et al.: INSPIRED Symposium Part 3: Prevention and Management of Pediatric Chimeric Antigen Receptor T Cell-Associated Emergent Toxicities. Transplant Cell Ther 30 (1): 38-55, 2024.37821079
Mueller KT, Waldron E, Grupp SA, et al.: Clinical Pharmacology of Tisagenlecleucel in B-cell Acute Lymphoblastic Leukemia. Clin Cancer Res 24 (24): 6175-6184, 2018.30190371
Gardner RA, Ceppi F, Rivers J, et al.: Preemptive mitigation of CD19 CAR T-cell cytokine release syndrome without attenuation of antileukemic efficacy. Blood 134 (24): 2149-2158, 2019.31697826
Kadauke S, Myers RM, Li Y, et al.: Risk-Adapted Preemptive Tocilizumab to Prevent Severe Cytokine Release Syndrome After CTL019 for Pediatric B-Cell Acute Lymphoblastic Leukemia: A Prospective Clinical Trial. J Clin Oncol 39 (8): 920-930, 2021.33417474
Gust J, Ponce R, Liles WC, et al.: Cytokines in CAR T Cell-Associated Neurotoxicity. Front Immunol 11: 577027, 2020.33391257
Parker KR, Migliorini D, Perkey E, et al.: Single-Cell Analyses Identify Brain Mural Cells Expressing CD19 as Potential Off-Tumor Targets for CAR-T Immunotherapies. Cell 183 (1): 126-142.e17, 2020.32961131
Ragoonanan D, Khazal SJ, Abdel-Azim H, et al.: Diagnosis, grading and management of toxicities from immunotherapies in children, adolescents and young adults with cancer. Nat Rev Clin Oncol 18 (7): 435-453, 2021.33608690
Shah NN, Highfill SL, Shalabi H, et al.: CD4/CD8 T-Cell Selection Affects Chimeric Antigen Receptor (CAR) T-Cell Potency and Toxicity: Updated Results From a Phase I Anti-CD22 CAR T-Cell Trial. J Clin Oncol 38 (17): 1938-1950, 2020.32286905
McNerney KO, Si Lim SJ, Ishikawa K, et al.: HLH-like toxicities predict poor survival after the use of tisagenlecleucel in children and young adults with B-ALL. Blood Adv 7 (12): 2758-2771, 2023.36857419
Pasquini MC, Hu ZH, Curran K, et al.: Real-world evidence of tisagenlecleucel for pediatric acute lymphoblastic leukemia and non-Hodgkin lymphoma. Blood Adv 4 (21): 5414-5424, 2020.33147337
Maude SL, Laetsch TW, Buechner J, et al.: Tisagenlecleucel in Children and Young Adults with B-Cell Lymphoblastic Leukemia. N Engl J Med 378 (5): 439-448, 2018.29385370
Chow VA, Shadman M, Gopal AK: Translating anti-CD19 CAR T-cell therapy into clinical practice for relapsed/refractory diffuse large B-cell lymphoma. Blood 132 (8): 777-781, 2018.29914976
Neelapu SS, Locke FL, Bartlett NL, et al.: Axicabtagene Ciloleucel CAR T-Cell Therapy in Refractory Large B-Cell Lymphoma. N Engl J Med 377 (26): 2531-2544, 2017.29226797

## Latest Updates to This Summary (06/13/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of CAR T-cell therapy in treating pediatric cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Pediatric Chimeric Antigen Receptor (CAR) T-Cell Therapy are:

- Thomas G. Gross, MD, PhD (National Cancer Institute)
- Michael A. Pulsipher, MD (Huntsman Cancer Institute at University of Utah)
- Sarah K. Tasian, MD (Children's Hospital of Philadelphia)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Pediatric Chimeric Antigen Receptor (CAR) T-Cell Therapy. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/hp-stem-cell-transplant/car-t-cell-therapy. Accessed <MM/DD/YYYY>. [PMID: 35133769]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).